# Cervical Cancer Causes, Risk Factors, and Prevention

Patient Version

This PDQ cancer information summary has current information about cervical cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## HPV infection causes cervical cancer

Long-lasting (persistent) infection with high-risk types of human papillomavirus (HPV) causes virtually all cervical cancers. Two high-risk types, HPV 16 and HPV 18, cause 70% of cervical cancers worldwide.

Nearly all people who are sexually active will become infected with HPV at some point in their lives. Most HPV infections go away on their own within a year or two as the immune system controls the infection. These short-term infections do not cause cancer. When a high-risk HPV infection lasts for years, it can lead to changes in the cervical cells, resulting in a precancerous lesion. If the precancerous lesion is not found and removed, it may eventually develop into cervical cancer.

People who become sexually active at a young age, especially before age 18, or have multiple sexual partners are more likely to become infected with a high-risk type of HPV.

To learn more about how HPV causes cervical and other cancers, see HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-and-cancer).

### Factors that increase the risk that an HPV infection will cause cancer

Some risk factors make it more likely for a person who has a high-risk HPV infection of the cervix to develop cervical cancer. These risk factors include:

- Having a weakened immune system. This can lower the body’s ability to fight an HPV infection. HPV infections are more likely to be persistent and progress to cancer in people who are immunocompromised than in people who are not immunocompromised. You may be immunocompromised if you:
  - have an HIV infection or another disease that weakens your immune system
  - take medicine to suppress your immune response, such as to prevent organ rejection after a transplant, to treat an autoimmune disease, or to treat cancer
- Smoking or breathing in secondhand smoke. People who smoke or breathe in secondhand smoke have an increased risk of developing cervical cancer. The risk increases the more a person smokes or is exposed to secondhand smoke.
  Learn about different tools to help you quit smoking and how to use them. (https://smokefree.gov/)
- Reproductive factors. Both the use of oral contraceptives (birth control pills) and giving birth to many children are associated with an increased risk of cervical cancer. The reasons for these associations are not well understood.
- Obesity. Cervical cancer screening may be more difficult in those with obesity, leading to lower detection of precancers and a higher risk of cancer.

### DES exposure is a rare cause of cervical cancer

Being exposed to a drug called diethylstilbestrol (DES) in the womb is an independent risk factor for a type of cervical cancer called clear cell adenocarcinoma. Between 1940 and 1971, DES was given to some pregnant women in the United States to prevent miscarriage (premature birth of a fetus that cannot survive) and early labor. Women whose mothers took DES while pregnant have an increased risk of cervical cell abnormalities and of clear cell adenocarcinoma of the vagina and cervix.

To learn more, see Diethylstilbestrol (DES) Exposure and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/hormones/des-fact-sheet).

### Cervical cancer is preventable

Cervical cancer is highly preventable and highly curable if caught early. Nearly all cervical cancers could be prevented by HPV vaccination, routine cervical cancer screening, and appropriate follow-up treatment when needed.

#### HPV vaccination

HPV vaccination is a safe and effective way to help prevent cervical cancer. Gardasil 9 (https://www.cancer.gov/about-cancer/treatment/drugs/recombinant-HPV-nonavalent-vaccine) is the FDA-approved vaccine for females and males aged 9 to 45 in the United States. Gardasil 9 is approved to prevent precancers and cancers caused by seven cancer-causing HPV types (16, 18, 31, 33, 45, 52, and 58) and to prevent genital warts caused by HPV types 6 and 11. The HPV vaccine does not treat an existing HPV infection.

#### Timing of HPV vaccination

The HPV vaccine offers the most protection when given before a person becomes sexually active. Those who are already sexually active may benefit less from the vaccine. This is because sexually active people may have been exposed to some of the HPV types the vaccine targets.

The Centers for Disease Control and Prevention (https://www.cdc.gov/hpv/vaccines/?CDC_AAref_Val=https://www.cdc.gov/vaccines/vpd/hpv/public/index.html) (CDC) recommends routine HPV vaccination for girls and boys at age 11 or 12, and the vaccine can be given starting at age 9. For young people who weren’t vaccinated within the age recommendations, HPV vaccination is recommended up to age 26. Some adults between the ages of 27 and 45 who are not already vaccinated may decide to get the HPV vaccine after talking with their doctor about their risk of new HPV infections.

The HPV vaccine is given as a series of two or three doses, depending on age. CDC recommends that children who start the vaccine series before age 15 receive two doses. For people who receive the first dose on or after their 15th birthday, and for people with certain immunocompromising conditions, CDC recommends getting three doses.

Learn more about HPV vaccines (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-vaccine-fact-sheet).

#### Cervical cancer screening

Because HPV vaccination doesn’t protect against all HPV types that can cause cervical cancer, getting screened at regular intervals is still important.

Two widely used screening tests are HPV tests and cytology tests (also known as Pap test or Pap smear). These tests can find high-risk HPV infections and abnormal cell changes and precancers that can be treated before they turn into cancer. So it is important for people with a cervix to have regular screening tests starting in their 20s. Learn more about screening with the HPV test and Pap test (https://www.cancer.gov/types/cervical/screening).

For cervical cancer screening to be effective, people need to get timely screening and follow up of abnormal test results. Because of social, environmental, and economic disadvantages, certain groups may have difficulty accessing health care and, as a result, bear a disproportionate burden of cervical cancer. Learn about cancer disparities (https://www.cancer.gov/about-cancer/understanding/disparities).

Learn more about screening with the HPV test and Pap test, including help finding screening services near you (https://www.cancer.gov/types/cervical/screening).

#### Condoms

Condoms, which prevent some sexually transmitted diseases, can decrease the risk of HPV transmission. However, they do not completely prevent it. Therefore, exposure to HPV is still possible in areas that are not covered by the condom.